# Aromatherapy With Essential Oils (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the use of aromatherapy with essential oils in the treatment of people with cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

This cancer information summary provides an overview of the use of aromatherapy with essential oils primarily to improve the quality of life of cancer patients. This summary includes a brief history of aromatherapy, a review of laboratory studies and clinical trials, and possible adverse effects associated with aromatherapy use.

This summary contains the following key information:

- Aromatherapy is the therapeutic use of essential oils (also known as volatile oils) from plants (flowers, herbs, or trees) for the improvement of physical, emotional, and spiritual well-being.
- Aromatherapy is used by patients with cancer primarily as supportive care for general well-being.
- Aromatherapy is commonly used with other complementary treatments (e.g., massage and acupuncture) as well as with standard treatments for symptom management.
- Essential oils are volatile liquid substances extracted from aromatic plant material by steam distillation or mechanical expression; oils produced with the aid of chemical solvents are not considered true essential oils.
- As essential oils age, the chemical composition changes. Many essential oils do not have an expiration date.
- Essential oils are available in the United States for inhalation and topical treatment. Topical treatments are generally used in diluted forms.
- Aromatherapy is not widely administered via ingestion.
- The effects of aromatherapy are theorized to result from the binding of chemical components in the essential oil to receptors in the olfactory bulb, impacting the brain’s emotional center, the limbic system. Topical application of aromatic oils may exert antibacterial, anti-inflammatory, and analgesic effects.
- Studies in animals show sedative and stimulant effects of specific essential oils as well as positive effects on behavior and the immune system. Functional imaging studies in humans support the influence of odors on the limbic system and its emotional pathways.
- Human clinical trials have investigated aromatherapy primarily in the treatment of stress and anxiety in patients with critical illnesses or in other hospitalized patients. Several clinical trials involving patients with cancer have been published.
- Aromatherapy has a relatively low toxicity profile when administered by inhalation or diluted topical application.
- Aromatherapy products are not subject to approval by the U.S. Food and Drug Administration unless there is a claim for treatment of specific diseases.

Many of the medical and scientific terms used in the summary are hypertext linked (at first use in each section) to the NCI Dictionary of Cancer Terms (https://www.cancer.gov/publications/dictionaries/cancer-terms/), which is oriented toward nonexperts. When a linked term is clicked, a definition will appear in a separate window.

Reference citations in some PDQ cancer information summaries may include links to external websites that are operated by individuals or organizations for the purpose of marketing or advocating the use of specific treatments or products. These reference citations are included for informational purposes only. Their inclusion should not be viewed as an endorsement of the content of the websites, or of any treatment or product, by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board or the National Cancer Institute.

## General Information

Aromatherapy is a derivative of herbal medicine, which is itself a subset of the biological or nature-based complementary and alternative medicine (CAM) therapies. Aromatherapy has been defined as the therapeutic use of essential oils from plants for the improvement of physical, emotional, and spiritual well-being.

Essential oils are volatile liquid substances extracted from aromatic plant material by steam distillation or mechanical expression. Essential oils produced with the aid of chemical solvents are not considered true essential oils because the solvent residues can alter the quality of the essential oils and lead to adulteration of the fragrance or to skin irritation.

Essential oils are made up of a large array of chemical components that consist of the metabolites found in various plant materials. The major chemical components of essential oils include monoterpenes, esters, aldehydes, ketones, alcohols, phenols, and oxides, which are volatile and may produce characteristic odors. Different types of essential oils contain varying amounts of each of these compounds, which are said to give each essential oil its particular fragrance and therapeutic characteristics. Plant species may have different chemovarieties (variations of subspecies that produce essential oils with different chemical compositions, as a result of genetic variation and growth conditions).[1] Thus, their essential oils can occur as several chemotypes that differ in chemical composition and may produce different clinical effects. It should be noted that essential oils are distinctly different chemically from (fatty) oils, such as those used as food. As essential oils age, the chemical composition changes. Many essential oils do not have an expiration date.

Synthetic odors are often made up of many of the same compounds that are components of the essential oils. These compounds are synthesized and typically combined with other odor-producing chemicals. However, synthetic fragrances frequently contain irritants, such as solvents and propellants, that can trigger sensitivities in some people.[2-4] Most aromatherapists believe that synthetic fragrances are inferior to essential oils because they lack natural or vital energy; however, this has been contested by odor psychologists and biochemists.[5]

Aromatherapy is used or claimed to be useful for a vast array of symptoms and conditions. Published studies regarding the uses of aromatherapy have generally focused on its psychological effects as a stress reliever or anxiolytic agent or its use as a topical treatment for skin-related conditions.

A large body of literature has been published on the effects of odors on the human brain and emotions. Some studies have tested the effects of essential oils on mood, alertness, and mental stress in healthy participants. Other studies investigated the effects of various (usually synthetic) odors on task performance, reaction time, and autonomic parameters or evaluated the direct effects of odors on the brain via electroencephalogram patterns and functional imaging studies.[6] Such studies have consistently shown that odors can produce specific effects on human neuropsychological and autonomic function and that odors can influence mood, perceived health, and arousal. These studies suggest that odors may have therapeutic applications in the context of stressful and adverse psychological conditions.

Practitioners of aromatherapy apply essential oils using several different methods, including the following:

- Indirect inhalation via a room diffuser or drops of oil placed near the patient (e.g., on a tissue), or inside a vial with saturated cotton.
- Direct inhalation used in an individual inhaler (e.g., a few drops of essential oil floated on top of hot water to aid a sinus headache).
- Aromatherapy massage, which is the application to the body of essential oils diluted in a carrier oil.

Other direct and indirect applications include mixing essential oils in bath salts and lotions or applying them to dressings.

Different aromatherapy practitioners may have different recipes for treating specific conditions, involving various combinations of essential oils and methods of application. Differences seem to be practitioner dependent, with some common uses more accepted throughout the aromatherapy community. Training and certification in aromatherapy for lay practitioners is available at several schools throughout the United States and United Kingdom; however, there is no professional standardization in the United States and no license is required to practice in either country. Thus, there is little consistency among practitioners in the specific treatments used for specific illnesses. This lack of standardization has led to variability in therapeutic protocols used in research on the effects of aromatherapy. Anecdotal evidence alone or previous experience has driven the choice of essential oils and different researchers choose different essential oils when studying the same applications. However, now there are specific courses for licensed health professionals that give nursing or continuing medical education credit hours, including a small research component and information about evaluating and measuring outcomes.

The National Association for Holistic Aromatherapy (NAHA) (www.naha.org/) and the Alliance of International Aromatherapists (www.alliance-aromatherapists.org) are the two governing bodies for national educational standards for aromatherapists. NAHA is taking steps toward standardizing aromatherapy certification in the United States. Many schools offer certificate programs approved by NAHA. A list of these schools can be found on the NAHA website (https://naha.org/index.php/education/approved-schools/). National examinations (http://www.aromatherapycouncil.org/) in aromatherapy are held twice per year.

The Canadian Federation of Aromatherapists has established standards for aromatherapy certification in Canada (www.cfacanada.com/). They also have standards for safety and professional conduct and a public directory of certified aromatherapists. Other countries may have similar organizations.

Although essential oils are given orally or internally by aromatherapists in France and Germany, their use is generally limited to inhalation or topical application in the United Kingdom and United States. Nonmedical use of essential oils is common in the flavoring and fragrance industries. Most essential oils have been classified as GRAS (generally recognized as safe), at specified concentration limits, by the U.S. Food and Drug Administration (FDA). For a list of international aromatherapy programs, see the International Federation of Aromatherapists website (www.ifaroma.org/ (https://ifaroma.org/en_GB/home)).

Aromatherapy products do not need approval by the FDA.

### References

Wildwood C: The Encyclopedia of Aromatherapy. Healing Arts Press, 1996.
Silva-Néto RP, Peres MF, Valença MM: Odorant substances that trigger headaches in migraine patients. Cephalalgia 34 (1): 14-21, 2014.23832131
Vethanayagam D, Vliagoftis H, Mah D, et al.: Fragrance materials in asthma: a pilot study using a surrogate aerosol product. J Asthma 50 (9): 975-82, 2013.23829679
Celeiro M, Guerra E, Lamas JP, et al.: Development of a multianalyte method based on micro-matrix-solid-phase dispersion for the analysis of fragrance allergens and preservatives in personal care products. J Chromatogr A 1344: 1-14, 2014.24767833
Dodd GH: The molecular dimension in perfumery. In: Van Toller S, Dodd GH, eds.: Perfumery: The Psychology and Biology of Fragrance. Chapman and Hall, 1988, pp 19-46.
Buchbauer G, Jirovetz L, Jäger W, et al.: Fragrance compounds and essential oils with sedative effects upon inhalation. J Pharm Sci 82 (6): 660-4, 1993.8331544

## History

Proponents of aromatherapy report that aromatic or essential oils have been used for thousands of years as stimulants or sedatives of the nervous system and as treatments for a wide range of other disorders.[1] They link it historically to the use of infused oils and unguents in the Bible and ancient Egypt,[1] remedies used throughout the Middle Ages and the Renaissance,[2] and the burning of aromatic plants in various religious rites. The current applications of aromatherapy did not come about until the early 20th century when the French chemist and perfumer Rene Gattefosse coined the term aromatherapy and published a book of that name in 1937.[2] Gattefosse proposed the use of aromatherapy to treat diseases in virtually every organ system, citing mostly anecdotal and case-based evidence.[2]

Although Gattefosse and his colleagues in France, Italy, and Germany studied the effects of aromatherapy for some 30 years, its use went out of fashion midcentury and was rediscovered by another Frenchman, a physician, Jean Valnet, in the latter part of the century. Valnet published his book The Practice of Aromatherapy in 1982,[3] at which time the practice became more well-known in Britain and the United States. Through the 1980s and 1990s, as patients in Western countries became increasingly interested in complementary and alternative medicine (CAM) treatments, aromatherapy developed a following that continues to grow to this day. In addition to the use of essential oils by nurses and aromatherapy practitioners for specific medical issues, the popularity of aromatherapy has also been exploited by cosmetics companies that have created lines of essential oil-based (although often with a synthetic component) cosmetics and toiletries, claiming to improve mood and well-being in their users.

Despite the growing popularity of aromatherapy in the latter part of the 20th century (especially in the United Kingdom), little research on aromatherapy was available in the English-language medical literature until the early or mid-1990s. The research that began to appear in the 1990s was most often conducted by nurses, who tended to be the primary practitioners of aromatherapy in the United States and United Kingdom (although it is dispensed by medical doctors in France and Germany). Aromatherapists now publish their own journal, the International Journal of Essential Oil Therapeutics. Also, many studies regarding the effects of odor on the brain and other systems in animals and healthy humans have been published in the context of odor psychology and neurobiology (and in the absence of the specific term aromatherapy).

In addition to topical antimicrobial uses,[4] aromatherapy has also been proposed for use in wound care [5,6] and to treat a variety of localized symptoms and illnesses such as alopecia, eczema, and pruritus.[7-9] Aromatherapy has also been studied via inhalation for airway reactivity.[10]

Studies on aromatherapy have examined a variety of other conditions, including the following:

- Sedation and arousal.[11,12]
- Startle reflex and reaction time.[13,14]
- Psychological states such as mood, anxiety, and general sense of well-being.[15-29]
- Psychiatric disorders.[30]
- Neurologic impairment.[23]
- Chronic renal failure.[24]
- Agitation in patients with dementia.[31-35]
- Smoking withdrawal symptoms.[36,37]
- Motion sickness.[38]
- Postoperative nausea.[39,40]
- Nausea and emesis in combination with fatigue, pain, and anxiety in patients in labor.[25,26,41]
- Pain alone.[42-45]
- Pain in combination with other symptoms.[22,23,25,26]

Published articles have described the use of aromatherapy in specific hospital settings such as cancer wards, hospices, and other areas where patients are critically ill and require palliative care for the following symptoms:

- Pain.
- Nausea.
- Lymphedema.[46,47]
- Generalized stress.
- Anxiety.[48]
- Depression.[49]

In addition, observational studies provide examples of the clinical uses of aromatherapy (and other CAM modalities), although they are generally not evidence based. Participants have included homebound patients with terminal disease,[50] and hospitalized patients with leukemia.[51] Aromatherapy has also been used to reduce malodor of necrotic ulcers in cancer patients.[52]

Studies of aromatherapy use with mental health patients have also been conducted.[53] Most of the resulting articles describe successful incorporation of aromatherapy into the treatment of these patients, although outcomes are clearly subjective.

Theories about the mechanism of action of aromatherapy with essential oils differ, depending on the community studying them. Proponents of aromatherapy often cite the connection between olfaction and the limbic system in the brain as the basis for the effects of aromatherapy on mood and emotions; less is said about proposed mechanisms for its effects on other parts of the body. Most of the aromatherapy literature, however, lacks in-depth neurophysiological studies on the nature of olfaction and its link to the limbic system, and it generally does not cite research that shows these links. Proponents of aromatherapy also believe that the effects of the treatments are based on the special nature of the essential oils used and that essential oils produce effects on the body that are greater than the sum of the individual chemical components of the scents.

These assertions have been contested by the biochemistry and psychology communities, which take a different view of the possible mechanism of action of odors on the human brain (most do not differentiate the odors produced by essential oils from those of synthetic fragrances).[30] This neurobiological view, which focuses mostly on the emotional and psychological effects of fragrances (as opposed to the other symptomatic effects claimed by aromatherapists), takes into account what is known about olfactory transduction and the connection of the olfactory system to other central nervous system functions, including memory; however, it is primarily theoretical because of the lack of significant research addressing this topic.

### References

Tisserand R: Essential oils as psychotherapeutic agents. In: Van Toller S, Dodd GH, eds.: Perfumery: The Psychology and Biology of Fragrance. Chapman and Hall, 1988, pp 167-80.
Gattefosse RM: Gattefosse's Aromatherapy. CW Daniel, 1993.
Valnet J: The Practice of Aromatherapy: A Classic Compendium of Plant Medicines & Their Healing Properties. Healing Arts Press, 1990.
Hartman D, Coetzee JC: Two US practitioners' experience of using essential oils for wound care. J Wound Care 11 (8): 317-20, 2002.12360766
Asquith S: The use of aromatherapy in wound care. J Wound Care 8 (6): 318-20, 1999.10776219
Edwards-Jones V, Buck R, Shawcross SG, et al.: The effect of essential oils on methicillin-resistant Staphylococcus aureus using a dressing model. Burns 30 (8): 772-7, 2004.15555788
Hay IC, Jamieson M, Ormerod AD: Randomized trial of aromatherapy. Successful treatment for alopecia areata. Arch Dermatol 134 (11): 1349-52, 1998.9828867
Anderson C, Lis-Balchin M, Kirk-Smith M: Evaluation of massage with essential oils on childhood atopic eczema. Phytother Res 14 (6): 452-6, 2000.10960901
Ro YJ, Ha HC, Kim CG, et al.: The effects of aromatherapy on pruritus in patients undergoing hemodialysis. Dermatol Nurs 14 (4): 231-4, 237-8, 256; quiz 239, 2002.12240499
Cohen BM, Dressler WE: Acute aromatics inhalation modifies the airways. Effects of the common cold. Respiration 43 (4): 285-93, 1982.7111875
Diego MA, Jones NA, Field T, et al.: Aromatherapy positively affects mood, EEG patterns of alertness and math computations. Int J Neurosci 96 (3-4): 217-24, 1998.10069621
Motomura N, Sakurai A, Yotsuya Y: Reduction of mental stress with lavender odorant. Percept Mot Skills 93 (3): 713-8, 2001.11806592
Miltner W, Matjak M, Braun C, et al.: Emotional qualities of odors and their influence on the startle reflex in humans. Psychophysiology 31 (1): 107-10, 1994.8146248
Millot JL, Brand G, Morand N: Effects of ambient odors on reaction time in humans. Neurosci Lett 322 (2): 79-82, 2002.11958848
Stevenson C: Measuring the effects of aromatherapy. Nurs Times 88 (41): 62-3, 1992 Oct 7-13.1491983
Dunn C, Sleep J, Collett D: Sensing an improvement: an experimental study to evaluate the use of aromatherapy, massage and periods of rest in an intensive care unit. J Adv Nurs 21 (1): 34-40, 1995.7897075
Buckle J: Aromatherapy. Nurs Times 89 (20): 32-5, 1993 May 19-25.8321672
Hadfield N: The role of aromatherapy massage in reducing anxiety in patients with malignant brain tumours. Int J Palliat Nurs 7 (6): 279-85, 2001.12066022
Wilkinson S: Aromatherapy and massage in palliative care. Int J Palliat Nurs 1 (1): 21-30, 1995.
Wilkinson S, Aldridge J, Salmon I, et al.: An evaluation of aromatherapy massage in palliative care. Palliat Med 13 (5): 409-17, 1999.10659113
Corner J, Cawler N, Hildebrand S: An evaluation of the use of massage and essential oils on the wellbeing of cancer patients. Int J Palliat Nurs 1 (2): 67-73, 1995.
Louis M, Kowalski SD: Use of aromatherapy with hospice patients to decrease pain, anxiety, and depression and to promote an increased sense of well-being. Am J Hosp Palliat Care 19 (6): 381-6, 2002 Nov-Dec.12442972
Walsh E, Wilson C: Complementary therapies in long-stay neurology in-patient settings. Nurs Stand 13 (32): 32-5, 1999 Apr 28-May 4.10427231
Itai T, Amayasu H, Kuribayashi M, et al.: Psychological effects of aromatherapy on chronic hemodialysis patients. Psychiatry Clin Neurosci 54 (4): 393-7, 2000.10997854
Burns E, Blamey C: Complementary medicine. Using aromatherapy in childbirth. Nurs Times 90 (9): 54-60, 1994 Mar 2-8.8152975
Burns EE, Blamey C, Ersser SJ, et al.: An investigation into the use of aromatherapy in intrapartum midwifery practice. J Altern Complement Med 6 (2): 141-7, 2000.10784271
Kite SM, Maher EJ, Anderson K, et al.: Development of an aromatherapy service at a Cancer Centre. Palliat Med 12 (3): 171-80, 1998.9743836
Komori T, Fujiwara R, Tanida M, et al.: Effects of citrus fragrance on immune function and depressive states. Neuroimmunomodulation 2 (3): 174-80, 1995 May-Jun.8646568
Wiebe E: A randomized trial of aromatherapy to reduce anxiety before abortion. Eff Clin Pract 3 (4): 166-9, 2000 Jul-Aug.11183431
Perry N, Perry E: Aromatherapy in the management of psychiatric disorders: clinical and neuropharmacological perspectives. CNS Drugs 20 (4): 257-80, 2006.16599645
Ballard CG, O'Brien JT, Reichelt K, et al.: Aromatherapy as a safe and effective treatment for the management of agitation in severe dementia: the results of a double-blind, placebo-controlled trial with Melissa. J Clin Psychiatry 63 (7): 553-8, 2002.12143909
Smallwood J, Brown R, Coulter F, et al.: Aromatherapy and behaviour disturbances in dementia: a randomized controlled trial. Int J Geriatr Psychiatry 16 (10): 1010-3, 2001.11607948
Holmes C, Hopkins V, Hensford C, et al.: Lavender oil as a treatment for agitated behaviour in severe dementia: a placebo controlled study. Int J Geriatr Psychiatry 17 (4): 305-8, 2002.11994882
Gray SG, Clair AA: Influence of aromatherapy on medication administration to residential-care residents with dementia and behavioral challenges. Am J Alzheimers Dis Other Demen 17 (3): 169-74, 2002 May-Jun.12083347
Snow LA, Hovanec L, Brandt J: A controlled trial of aromatherapy for agitation in nursing home patients with dementia. J Altern Complement Med 10 (3): 431-7, 2004.15253846
Rose JE, Behm FM: Inhalation of vapor from black pepper extract reduces smoking withdrawal symptoms. Drug Alcohol Depend 34 (3): 225-9, 1994.8033760
Sayette MA, Parrott DJ: Effects of olfactory stimuli on urge reduction in smokers. Exp Clin Psychopharmacol 7 (2): 151-9, 1999.10340155
Post-White N, Nichols W: Randomized trial testing of QueaseEase™ essential oil for motion sickness. International Journal of Essential Oil Therapeutics 1 (4): 158-66, 2007.
Tate S: Peppermint oil: a treatment for postoperative nausea. J Adv Nurs 26 (3): 543-9, 1997.9378876
Hines S, Steels E, Chang A, et al.: Aromatherapy for treatment of postoperative nausea and vomiting. Cochrane Database Syst Rev 4: CD007598, 2012.22513952
Oyama H, Kaneda M, Katsumata N, et al.: Using the bedside wellness system during chemotherapy decreases fatigue and emesis in cancer patients. J Med Syst 24 (3): 173-82, 2000.10984871
Dale A, Cornwell S: The role of lavender oil in relieving perineal discomfort following childbirth: a blind randomized clinical trial. J Adv Nurs 19 (1): 89-96, 1994.8138636
Göbel H, Schmidt G, Soyka D: Effect of peppermint and eucalyptus oil preparations on neurophysiological and experimental algesimetric headache parameters. Cephalalgia 14 (3): 228-34; discussion 182, 1994.7954745
Marchand S, Arsenault P: Odors modulate pain perception: a gender-specific effect. Physiol Behav 76 (2): 251-6, 2002.12044597
Kim JT, Wajda M, Cuff G, et al.: Evaluation of aromatherapy in treating postoperative pain: pilot study. Pain Pract 6 (4): 273-7, 2006.17129308
Barclay J, Vestey J, Lambert A, et al.: Reducing the symptoms of lymphoedema: is there a role for aromatherapy? Eur J Oncol Nurs 10 (2): 140-9, 2006.16563861
Kohara H, Miyauchi T, Suehiro Y, et al.: Combined modality treatment of aromatherapy, footsoak, and reflexology relieves fatigue in patients with cancer. J Palliat Med 7 (6): 791-6, 2004.15684846
Buckle J: Clinical Aromatherapy: Essential Oils in Practice. 2nd ed. Churchill Livingston, 2003.
Wilkinson SM, Love SB, Westcombe AM, et al.: Effectiveness of aromatherapy massage in the management of anxiety and depression in patients with cancer: a multicenter randomized controlled trial. J Clin Oncol 25 (5): 532-9, 2007.17290062
Rimmer L: The clinical use of aromatherapy in the reduction of stress. Home Healthc Nurse 16 (2): 123-6, 1998.9526345
Stringer J: Massage and aromatherapy on a leukaemia unit. Complement Ther Nurs Midwifery 6 (2): 72-6, 2000.10844744
Warnke PH, Sherry E, Russo PA, et al.: Antibacterial essential oils in malodorous cancer patients: clinical observations in 30 patients. Phytomedicine 13 (7): 463-7, 2006.16785038
Hicks G: Aromatherapy as an adjunct to care in a mental health day hospital. J Psychiatr Ment Health Nurs 5 (4): 317, 1998.9807369

## Laboratory/Animal/Preclinical Studies

Numerous studies on the topical antibacterial effects of essential oils have been published; most have found the essential oils to have significant antimicrobial activity.[1] Some essential oils are antiviral and inhibit replication of the herpes simplex virus.[2] Other essential oils are fungistatic and fungicidal against both vaginal and oropharyngeal Candida albicans.[3]

Studies on rats in Europe and Japan have shown that exposure to various odors can result in stimulation or sedation, as well as changes in behavioral responses to stress and pain. A study [4] on the sedative effects of essential oils and other fragrance compounds (mostly individual chemical components of the essential oils) on rat motility showed that lavender oil (Lavandula angustifolia Miller [synonyms: Lavandula spicata L.; Lavandula vera DC.]) in particular had a significant sedative effect, and several single-oil constituents (as opposed to whole essential oils) had similarly strong effects. The authors do not comment on the presumed mechanism for this effect. The differences in bioavailability are ascribed to different levels of lipophilicity, with the more lipophilic oils producing the most sedative effects. The researchers also found significant plasma levels of the fragrance compounds after inhalation, suggesting that the effects of aromatherapy result from a direct pharmacological interaction rather than an indirect central nervous system relay.

Other studies have investigated the effects of aromatherapy on rats’ behavioral and immunological responses to painful, stressful, or startling stimuli. In two European studies, rats exposed to pleasant odors during painful stimuli exhibited decreased pain-related behaviors, with some variation in response between the sexes.[5,6] Two studies from Japan showed an improvement in immunological and behavioral markers in rats exposed to fragrances while under stressful conditions.[7,8]

### References

Aridoğan BC, Baydar H, Kaya S, et al.: Antimicrobial activity and chemical composition of some essential oils. Arch Pharm Res 25 (6): 860-4, 2002.12510839
Minami M, Kita M, Nakaya T, et al.: The inhibitory effect of essential oils on herpes simplex virus type-1 replication in vitro. Microbiol Immunol 47 (9): 681-4, 2003.14584615
D'Auria FD, Tecca M, Strippoli V, et al.: Antifungal activity of Lavandula angustifolia essential oil against Candida albicans yeast and mycelial form. Med Mycol 43 (5): 391-6, 2005.16178366
Buchbauer G, Jirovetz L, Jäger W, et al.: Fragrance compounds and essential oils with sedative effects upon inhalation. J Pharm Sci 82 (6): 660-4, 1993.8331544
Aloisi AM, Ceccarelli I, Masi F, et al.: Effects of the essential oil from citrus lemon in male and female rats exposed to a persistent painful stimulation. Behav Brain Res 136 (1): 127-35, 2002.12385797
Jahangeer AC, Mellier D, Caston J: Influence of olfactory stimulation on nociceptive behavior in mice. Physiol Behav 62 (2): 359-66, 1997.9251980
Shibata H, Fujiwara R, Iwamoto M, et al.: Immunological and behavioral effects of fragrance in mice. Int J Neurosci 57 (1-2): 151-9, 1991.1938152
Fujiwara R, Komori T, Noda Y, et al.: Effects of a long-term inhalation of fragrances on the stress-induced immunosuppression in mice. Neuroimmunomodulation 5 (6): 318-22, 1998 Nov-Dec.9762013

## Human/Clinical Studies

No studies in the published peer-reviewed literature discuss aromatherapy as a treatment for cancer specifically. The studies discussed below, most of which were conducted in patients with cancer, primarily focus on the following:

- Other health-related conditions.
- Procedure-related symptoms.
- Infection control.
- Quality-of-life (QOL) measures such as stress and anxiety levels.

These studies purport to test the efficacy of aromatherapy, implying that the products used contain essential oils; however, only an occasional reference article includes significant descriptive information about the product(s) used (e.g., composition, source) thereby greatly limiting the ability of interested clinicians and researchers to compare or duplicate studies or produce meaningful meta-analyses of the research results.

### Anxiety and Depression

A major review published in 2000 [1] focused on six studies investigating treatment or prevention of anxiety with aromatherapy massage. Although the studies suggested that aromatherapy massage had a mild transient anxiolytic effect, the authors concluded that the research done at that time was not sufficiently rigorous or consistent to prove the effectiveness of aromatherapy in treating anxiety. This review excluded trials related to other effects of aromatherapy (such as pain control) and did not include any studies looking at the effects of odors that were not specifically labeled as aromatherapy.

Another randomized controlled trial investigated the effects of massage or aromatherapy massage in 103 cancer patients who were randomly assigned to receive massage using a carrier oil (massage group) or massage using a carrier oil plus the Roman chamomile essential oil (Chamaemelum nobile [L.] All. [synonym: Anthemis nobilis L.]) (aromatherapy massage group).[2] Two weeks after the massage, a statistically significant reduction was found in anxiety in the aromatherapy massage group (as measured by the State-Trait Anxiety Inventory) and improvement in symptoms (as measured by the Rotterdam Symptom Checklist [RSCL]). The subscales with improved scores were psychological, QOL, severe physical, and severe psychological. The massage-only group showed improvement on four RSCL subscales; however, these improvements did not reach statistical significance.

A study that evaluated an aromatherapy service following changes made after an initial pilot at a U.K. cancer center, also reported on the experiences of patients referred to the service.[3] Of the 89 patients originally referred, 58 patients completed six aromatherapy sessions. Significant improvements in anxiety and depression (as measured by the Hospital Anxiety and Depression Scale [HADS]) were reported at study completion in comparison with measurements taken before the six sessions.

A placebo-controlled, double-blind, randomized trial conducted in Australia investigated the effects of inhalation aromatherapy on anxiety during radiation therapy.[4] A total of 313 patients who received radiation therapy were randomly assigned to one of three groups (carrier oil with essential oils, carrier oil only, or pure essential oils of lavender, bergamot (Citrus aurantium L. ssp. bergamia [Risso] Wright & Arn. [Rutaceae]; [synonym: Citrus bergamia Risso]), and cedarwood (Cedrus atlantica [Endl.] Manetti ex Carriere [Pinaceae])). All three groups received the oils by inhalation during radiation therapy. There were no significant differences reported in depression (as measured by HADS) or psychological effects (as measured by the Somatic and Psychological Health Report) between the groups. The group that received carrier oil only showed a statistically significant decrease in anxiety (as measured by HADS) compared with the other two groups.

### Health-Related Quality of Life

A randomized, controlled, pilot study examined the effects of adjunctive aromatherapy massage on mood, QOL, and physical symptoms in patients with cancer.[5] Forty-six patients were randomly assigned to either conventional day care alone or day care plus weekly aromatherapy massage using a standardized blend of essential oils (1% lavender and chamomile in sweet almond carrier oil) for 4 weeks. Patients self-rated their mood, QOL, and the intensity of the two symptoms that were the most concerning to them at the beginning of the study and at weekly intervals thereafter. Of the 46 patients, only 11 of 23 patients (48%) in the aromatherapy group and 18 of 23 patients (78%) in the control group completed all 4 weeks. Patient-reported mood, symptoms, and QOL improved in both groups, and there were no statistically significant differences between the two groups in any of these measures.

### Sleep

A placebo-controlled, double-blind, crossover, randomized trial compared an essential oil (choice of lavender, peppermint, or chamomile) with a pleasant-smelling placebo (rose water) administered by diffuser overnight for 3 weeks in 50 adult patients with newly diagnosed acute myeloid leukemia who were hospitalized for administration of intensive chemotherapy.[6] Most patients reported poor quality sleep on the Pittsburgh Sleep Quality Index (PSQI) at baseline, with a mean score of 12.7. During the aromatherapy week, the mean PSQI score decreased to 9.7, but returned to a near-baseline score of 12.4 during the washout week. The difference in mean PSQI score and mean placebo score was statistically significant (P = .0001). Aromatherapy also reduced the weekly average Edmonton Symptom Assessment Scale–Revised (ESASr) score by 6.06 points, which was statistically significant (P = .0006). All subscales demonstrated a reduction in ESASr score with six symptom score changes showing a statistically significant benefit from aromatherapy:

- Tiredness (P = .02).
- Drowsiness (P = .03).
- Lack of appetite (P = .02).
- Depression (P = .003).
- Anxiety (P = .03).
- Well-being (P = .05).

Another randomized controlled trial examined the effects of aromatherapy massage and massage alone in 42 patients with advanced cancer over a 4-week period.[7] Patients were randomly assigned to one of the following groups:

- Aromatherapy group: received massages with lavender essential oil (Lavandula angustifolia Miller [synonyms: Lavandula spicata L.; Lavandula vera DC.]) and an inert carrier oil.
- Massage-only group: received massages with an inert oil only.
- Control group: no massage.

No significant long-term benefits of aromatherapy or massage in pain control, QOL, or anxiety were reported, but sleep scores (as measured by the Verran and Snyder-Halpern sleep scale) improved significantly in both groups. A statistically significant reduction in depression scores was also reported (as measured by the HADS) in the massage-only group.

A randomized controlled trial of lavender, tea tree oil, or no-treatment control in adult patients who received outpatient chemotherapy with paclitaxel reported that trait anxiety and sleep quality improved with lavender, and that tea tree oil led to the highest change in sleep quality. However, changes in anxiety were observed only on the trait anxiety scores, not on the state anxiety scores, which may reflect short term changes associated with an aromatherapy intervention. In addition, there were no significant differences in sleep scores between the two aromatherapy groups and the controls, which the study was designed to detect.[8]

### Xerostomia

Radioactive iodine damage to normal salivary glands may be minimized by increased saliva production during the period of treatment. Inhalation aromatherapy was evaluated for its ability to increase saliva production during this administration period. An aromatherapy intervention consisting of a 2:1 mixture of lemon and ginger essential oils versus a distilled water (no smell) control inhaled for 10 min/d during a 2-week hospitalization for administration of radioactive iodine therapy for differentiated thyroid cancer was investigated in a randomized controlled trial of 71 patients. Salivary gland function was assessed by scintigraphy. Compared with placebo, those in the aromatherapy group showed a significantly higher rate of change of the maximum accumulation ratio in the parotid and submandibular glands (P < .05) and a significantly increased rate of change of the washout ratio before and after therapy in the bilateral parotid glands (P < .05). Although an increasing trend was observed for the submandibular glands in subjects receiving aromatherapy, no significant differences were noted between the groups.[9] These results suggest that by increasing saliva production during radioactive iodine treatment with inhalation aromatherapy with a lemon and ginger combination, increased iodine clearance in salivary glands may lead to reductions in long-term damage to saliva production.

### Nausea and Vomiting

A randomized, controlled, crossover trial investigated the effects of inhaled ginger essential oil on alleviating chemotherapy-induced nausea and vomiting in Asian women with breast cancer.[10] Aromatherapy administered as inhaled ginger essential oil for 5 days was associated with small statistically significant, but not clinically significant, reductions in acute nausea and had limited effects on reducing vomiting or delaying nausea in 60 evaluable patients.

Another study evaluated the efficacy of an aromatherapy intervention for reduction of symptom intensity of nausea, retching, and/or coughing among adult patients who received stem cells preserved in dimethyl sulfoxide. The study found that an intervention of tasting or sniffing sliced oranges was more effective at reducing symptom intensity compared with orange essential oil inhalation aromatherapy.[11]

### Procedure-Related Symptoms

In a randomized placebo-controlled study of two different types of external aromatherapy tabs (lavender-sandalwood and orange-peppermint) compared with a matched placebo-controlled delivery system in 87 women undergoing breast biopsies, there was a statistically significant reduction in self-reported anxiety with the use of the lavender-sandalwood aromatherapy tab compared with the placebo group (P = .032).[12]

In a three-arm randomized trial of 123 patients that compared lavender, eucalyptus, and no essential oil administered via inhalation, procedural pain after needle insertion into an implantable central venous port catheter was significantly decreased in the lavender oil inhalation aromatherapy group compared with the control group. Inhalation of eucalyptus oil did not reduce procedural pain levels during needle insertion.[13]

A four-arm randomized trial compared aromatherapy, music therapy, a combination of the two, and a placebo in breast cancer patients before and after a mastectomy. The aromatherapy arm utilized a mixture of lavender, bergamot, and geranium essential oils, while the music arm offered a choice of music styles. Measured endpoints included pain intensity and anxiety. The combination of treatments was superior to either single treatment with all endpoints.[14]

Table 1. Use of Aromatherapy as a Supportive Care Agent in Cancer and Palliative Care for Anxiety and Depression: Table of Clinical Studies

Reference | Trial Design | Essential Oil/Route of Administration | Treatment Groups (Enrolled; Treated; Placebo or No Treatment Control) | Condition or Cancer Type | Concurrent Therapy Used | Results | Level of Evidence Score^b^
[4] | Double-blind, randomized, controlled trial | Lavender, bergamot (Citrus aurantium L. ssp. bergamia [Risso] Wright & Arn. [Rutaceae]; [synonym: Citrus bergamia Risso]), and cedarwood (Cedrus atlantica [Endl.] Manetti ex Carriere [Pinaceae])/inhalation | 313; 100 (pure essential oils), 100 (carrier oil with fractionated low-grade essential oils), 100 (carrier oil only, no fragrance) | Anxiety | Unknown | Primary outcome: no effect on anxiety; secondary outcome: no effect on depression or fatigue | 1iC
[2] | Randomized nonblinded trial | Chamomile/massage | 103; 43; 44 | Physical and psychological symptoms, QOL | Unknown | Primary outcomes: reduction in anxiety and in physical and psychological symptoms; improved QOL | 1iiC
[15] | Consecutive case series ^a^ | Lavender or chamomile/massage | 12; 8; none | Anxiety, depression | Unknown | Primary outcome: no reduction in anxiety or depression; secondary outcome: reduction in blood pressure, pulse, and respiration | 3iiC

QOL = quality of life.

^a^Patients with malignant brain tumors.

^b^For information about levels of evidence analysis and scores, see Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

Table 2. Use of Aromatherapy as a Supportive Care Agent in Cancer and Palliative Care for Health-Related Quality of Life Symptoms: Table of Clinical Studies

Reference | Trial Design | Essential Oil/Route of Administration | Treatment Groups (Enrolled; Treated; Placebo or No Treatment Control) | Condition or Cancer Type | Concurrent Therapy Used | Results | Level of Evidence Score^d^
[6] | Randomized, double-blind, placebo-controlled trial | Lavender, peppermint, or chamomile/inhalation | 53; 25; 28 | Insomnia, shortness of breath, tiredness, drowsiness, pain, nausea, appetite, depression, anxiety, well-being | Unknown | Primary outcome: improvements in tiredness, drowsiness, lack of appetite, depression, anxiety, and well-being | 1iC
[9] | Randomized controlled trial | Lemon and ginger/inhalation | 71; 35; 36 | Salivary gland damage | Unknown | Primary outcome: compared with control group, the rate of change of the accumulation rate (marker of saliva production) was significantly higher in the parotid glands and submandibular glands of the aromatherapy group | 1iC
[5] | Randomized nonblinded trial | Lavender (Lavandula angustifolia Miller [synonyms: Lavandula spicata L.; Lavandula vera DC.]) and chamomile blend/massage | 46; 11; 18 | Mood, QOL, physical symptoms | Unknown | Primary outcome: no effect on mood, QOL, or physical symptoms | 1iiC
[7] | Randomized nonblinded trial | Lavender/massage | 42; 29; 13 | Pain | Unknown | Primary outcome: no effect on pain; secondary outcome: improved sleep in both groups; reduced depression (in massage group); no effect on QOL | 1iiC
[8] | Randomized controlled trial | Lavender, tea tree, or no oil/inhalation | 70; 30 (lavender), 20 (tea tree); 20 | Anxiety and sleep quality | Unknown | Primary outcomes: no improvement in state anxiety scores; no differences in changes in sleep quality between groups; secondary outcome: lower trait anxiety scores and higher sleep-quality scores observed with lavender oil | 1iiC
[16] | Randomized nonblinded trial | Chamomile/massage | 52; 26; 25 | QOL, physical symptoms, anxiety | Unknown | Primary outcome: improved QOL, fewer physical symptoms, reduced anxiety | 1iiC
[17] | Randomized nonblinded trial | Aromatherapy blend^a^/massage | 52; 34; 18 | Anxiety, mobility | Unknown | Primary outcomes: decreased anxiety, pain; improved mobility | 1iiC
[10] | Randomized, controlled, single-blind, crossover trial^b^ | Ginger essential oil/inhalation | 75; 30; 30 | Nausea, vomiting, HRQOL (EORTC QLQ-C30) | Yes | Primary outcomes: small reduction in acute nausea; no reduction in delayed nausea or vomiting episodes; secondary outcome: improved HRQOL | 1C
[11] | Randomized, controlled, single-blind trial | Sweet orange/inhalation | 60; 23 (orange sniffing), 19 (orange tasting); 18 | Symptom intensity (nausea, retching, cough) | Yes | Primary outcome: greatest reduction in symptom intensity with orange tasting/sniffing | 1C
[18] | Randomized controlled pilot trial | Peppermint (Mentha piperita; 2%), bergamot (Citrus bergamia; 1%), and cardamom (Elettaria cardamomum; 1%) in 100 mL of sweet almond carrier oil/inhalation or massage or no-treatment control | 75; 25 (massage), 25 (inhalation); 25 | Nausea and vomiting | Yes | Primary outcomes: nausea/retching improved with massage; nausea severity better with inhalation | 1iiC
[19] | Randomized single-blind trial | Choice of 20 essential oils/massage | 39; 20; 19 | Feasibility; mood | Unknown | Primary outcome: improvements in mood in both groups (aromatherapy massage and cognitive behavioral therapy); secondary outcome: preference for aromatherapy over cognitive behavioral therapy | 1C
[20] | Randomized single-blind trial | Choice of bitter orange, black pepper, rosemary, marjoram, or patchouli/massage | 45; 15 (aromatherapy massage), 15 (plain massage); 15 | Constipation; QOL | Yes | Primary outcome: improvement with aromatherapy massage; secondary outcome: improved QOL | 1C
[21] | Nonrandomized controlled clinical trial^c^ | Geranium (Pelargonium species), German chamomile (Matricaria recutita L. [synonyms: Matricaria chamomilla L., Chamomilla recutita (L.) Rausch.]), patchouli (Pogostemon cablin [Blanco] Benth. [Lamiaceae] [synonyms: Mentha cablin Blanco, Pogostemon patchouly Letettier]), and turmeric phytol/oral application | 48; 24; 24 | Gastrointestinal symptoms | Unknown | Primary outcome: no effect on gastrointestinal symptoms | 2C
[22] | Consecutive case | Various oils/massage | 69 | General symptoms | Unknown | Primary outcome: general improvement in symptoms reported by patients; no statistical analysis completed | 3iiC

EORTC QLQ-C30 = European Organization for Research and Treatment of Cancer Quality of Life Questionnaire; HRQOL = health-related quality of life; QOL = quality of life.

^a^Lavender (43%), rosewood (29%), rose (7%), and valerian (4%).

^b^Patients with breast cancer undergoing chemotherapy.

^c^Patients with breast cancer undergoing bone marrow transplantation.

^d^For information about levels of evidence analysis and scores, see Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

Table 3. Use of Aromatherapy as a Supportive Care Agent in Cancer and Palliative Care for Procedure-Related Symptoms: Table of Clinical Studies

Reference | Trial Design | Essential Oil/Route of Administration | Treatment Groups (Enrolled; Treated; Placebo or No Treatment Control) | Condition or Cancer Type | Concurrent Therapy Used | Results | Level of Evidence Score^a^
[12] | Randomized controlled trial | Lavender-sandalwood, orange-peppermint, or placebo/inhalation | 87; 30 (lavender), 30 (orange); 27 | Anxiety | Unknown | Primary outcome: reduction in anxiety with the use of lavender-sandalwood aromatherapy tab | 1iiC
[13] | Quasi-randomized controlled pilot study | Lavender (Lavandula officinalis) and eucalyptus (Eucalyptus globulus)/inhalation | 123; 41(lavender), 41 (eucalyptus); 41 | Pain, anxiety | No | Primary outcome: decreased procedural pain in the lavender oil group | 1iiC
[14] | Randomized controlled trial | Lavender, bergamot, geranium/inhalation | 160; 40 (essential oil), 40 (music), 40 (combination), 40 (usual care) | Breast cancer; mastectomy pain and anxiety | Yes | Combination of music and aromatherapy superior to individual treatments | 1iiC

^a^For information about levels of evidence analysis and scores, see Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

### Pediatric Population and Aromatherapy

Aromatherapy is used or claimed to be useful for a variety of symptoms and conditions. A book about aromatherapy in children suggests aromatherapy remedies for everything from acne to whooping cough.[23] When used safely, aromatherapy can help children feel calmer and sleep better.

A placebo-controlled, double-blind, randomized trial compared bergamot inhalation aromatherapy with a pleasant-smelling shampoo that did not contain essential oils in 37 children and adolescents who were undergoing stem cell transplant infusions. The study found that aromatherapy was not beneficial in reducing nausea, anxiety, or pain.[24] As administered in this study, bergamot inhalation aromatherapy may have contributed to persistent anxiety after the infusion of stem cells. Although no more effective than placebo, parents who received aromatherapy showed a significant decrease in their transitory anxiety during the period between the completion of their child’s infusion and 1 hour after infusion. Nausea and pain subsided over the course of the intervention for all children, although nausea remained significantly greater in patients who received aromatherapy. These findings suggest that the diffusion of bergamot essential oil may not provide suitable anxiolytic and antiemetic effects among children and adolescents undergoing stem cell transplantation. These results may be explained by the double-blind methodology of the trial, because single-blinded or nonblinded trials generally supported the aromatherapy intervention.

Table 4. Use of Aromatherapy as a Supportive Care Agent in Children with Cancer

Reference | Trial Design | Essential Oil/Route of Administration | Treatment Groups (Enrolled; Treated; Placebo or No Treatment Control) | Condition or Cancer Type | Concurrent Therapy Used | Results | Level of Evidence Score^a^
[24] | Randomized, placebo-controlled, double-blind trial | Bergamot/inhalation | 37; 17; 20 | Anxiety, nausea, pain in children undergoing stem cell transplant | Unknown | Primary outcomes: increased anxiety and nausea in children 1 hour after stem cell infusion in aromatherapy group; no effect on pain; secondary outcome: parental anxiety declined in both groups | 1iC

^a^For information about levels of evidence analysis and scores, see Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Cooke B, Ernst E: Aromatherapy: a systematic review. Br J Gen Pract 50 (455): 493-6, 2000.10962794
Wilkinson S, Aldridge J, Salmon I, et al.: An evaluation of aromatherapy massage in palliative care. Palliat Med 13 (5): 409-17, 1999.10659113
Kite SM, Maher EJ, Anderson K, et al.: Development of an aromatherapy service at a Cancer Centre. Palliat Med 12 (3): 171-80, 1998.9743836
Graham PH, Browne L, Cox H, et al.: Inhalation aromatherapy during radiotherapy: results of a placebo-controlled double-blind randomized trial. J Clin Oncol 21 (12): 2372-6, 2003.12805340
Wilcock A, Manderson C, Weller R, et al.: Does aromatherapy massage benefit patients with cancer attending a specialist palliative care day centre? Palliat Med 18 (4): 287-90, 2004.15198118
Blackburn L, Achor S, Allen B, et al.: The Effect of Aromatherapy on Insomnia and Other Common Symptoms Among Patients With Acute Leukemia. Oncol Nurs Forum 44 (4): E185-E193, 2017.28640576
Soden K, Vincent K, Craske S, et al.: A randomized controlled trial of aromatherapy massage in a hospice setting. Palliat Med 18 (2): 87-92, 2004.15046404
Ozkaraman A, Dügüm Ö, Özen Yılmaz H, et al.: Aromatherapy: The Effect of Lavender on Anxiety and Sleep Quality in Patients Treated With Chemotherapy Clin J Oncol Nurs 22 (2): 203-210, 2018.29547610
Nakayama M, Okizaki A, Takahashi K: A Randomized Controlled Trial for the Effectiveness of Aromatherapy in Decreasing Salivary Gland Damage following Radioactive Iodine Therapy for Differentiated Thyroid Cancer. Biomed Res Int 2016: 9509810, 2016.28042578
Lua PL, Salihah N, Mazlan N: Effects of inhaled ginger aromatherapy on chemotherapy-induced nausea and vomiting and health-related quality of life in women with breast cancer. Complement Ther Med 23 (3): 396-404, 2015.26051575
Potter P, Eisenberg S, Cain KC, et al.: Orange interventions for symptoms associated with dimethyl sulfoxide during stem cell reinfusions: a feasibility study. Cancer Nurs 34 (5): 361-8, 2011 Sep-Oct.21372706
Trambert R, Kowalski MO, Wu B, et al.: A Randomized Controlled Trial Provides Evidence to Support Aromatherapy to Minimize Anxiety in Women Undergoing Breast Biopsy. Worldviews Evid Based Nurs 14 (5): 394-402, 2017.28395396
Yayla EM, Ozdemir L: Effect of Inhalation Aromatherapy on Procedural Pain and Anxiety After Needle Insertion Into an Implantable Central Venous Port Catheter: A Quasi-Randomized Controlled Pilot Study. Cancer Nurs 42 (1): 35-41, 2019 Jan/Feb.29199999
Deng C, Xie Y, Liu Y, et al.: Aromatherapy Plus Music Therapy Improve Pain Intensity and Anxiety Scores in Patients With Breast Cancer During Perioperative Periods: A Randomized Controlled Trial. Clin Breast Cancer 22 (2): 115-120, 2022.34134947
Hadfield N: The role of aromatherapy massage in reducing anxiety in patients with malignant brain tumours. Int J Palliat Nurs 7 (6): 279-85, 2001.12066022
Wilkinson S: Aromatherapy and massage in palliative care. Int J Palliat Nurs 1 (1): 21-30, 1995.
Corner J, Cawler N, Hildebrand S: An evaluation of the use of massage and essential oils on the wellbeing of cancer patients. Int J Palliat Nurs 1 (2): 67-73, 1995.
Zorba P, Ozdemir L: The Preliminary Effects of Massage and Inhalation Aromatherapy on Chemotherapy-Induced Acute Nausea and Vomiting: A Quasi-Randomized Controlled Pilot Trial. Cancer Nurs 41 (5): 359-366, 2018 Sep/Oct.28426542
Serfaty M, Wilkinson S, Freeman C, et al.: The ToT study: helping with Touch or Talk (ToT): a pilot randomised controlled trial to examine the clinical effectiveness of aromatherapy massage versus cognitive behaviour therapy for emotional distress in patients in cancer/palliative care. Psychooncology 21 (5): 563-9, 2012.21370309
Lai TK, Cheung MC, Lo CK, et al.: Effectiveness of aroma massage on advanced cancer patients with constipation: a pilot study. Complement Ther Clin Pract 17 (1): 37-43, 2011.21168113
Gravett P: Treatment of gastrointestinal upset following high-dose chemotherapy. International Journal of Aromatherapy 11 (2): 84-6, 2001.
Evans B: An audit into the effects of aromatherapy massage and the cancer patient in palliative and terminal care. Complement Ther Med 3 (4): 239-41, 1995.
Worwood VA: Aromatherapy for the Healthy Child: More Than 300 Natural, Non-Toxic, and Fragrant Essential Oil Blends. New World Library, 2000.
Ndao DH, Ladas EJ, Cheng B, et al.: Inhalation aromatherapy in children and adolescents undergoing stem cell infusion: results of a placebo-controlled double-blind trial. Psychooncology 21 (3): 247-54, 2012.22383266

## Adverse Effects

Safety testing on essential oils has shown minimal adverse effects. Several essential oils have been approved for use as food additives and are classified as GRAS (generally recognized as safe) by the U.S. Food and Drug Administration; however, ingestion of large amounts of essential oils is not recommended. In addition, a few cases of contact dermatitis have been reported, mostly in aromatherapists who have had prolonged skin contact with essential oils in the context of aromatherapy massage.[1] Some essential oils (e.g., camphor oil) can cause local irritation; therefore, care should be taken when applying them. Phototoxicity has occurred when essential oils (particularly citrus oils) are applied directly to the skin before sun exposure. One case report also showed airborne contact dermatitis in the context of inhaled aromatherapy without massage.[2] Often, aromatherapy uses undefined mixtures of essential oils without specifying the plant sources. Allergic reactions are sometimes reported, especially after topical administration. Individual psychological associations with odors may result in adverse responses. Repeated exposure to lavender and tea tree oils by topical administration was shown in one study to be associated with reversible prepubertal gynecomastia.[3] The effects appear to have been caused by the purported weak estrogenic and antiandrogenic activities of lavender and tea tree oils. Therefore, avoiding these two essential oils is recommended in patients with estrogen-dependant tumors. However, this is the first published report of this type of adverse effect when using products containing tea tree or lavender oils.

### References

Bilsland D, Strong A: Allergic contact dermatitis from the essential oil of French marigold (Tagetes patula) in an aromatherapist. Contact Dermatitis 23 (1): 55-6, 1990.2401143
Schaller M, Korting HC: Allergic airborne contact dermatitis from essential oils used in aromatherapy. Clin Exp Dermatol 20 (2): 143-5, 1995.8565250
Henley DV, Lipson N, Korach KS, et al.: Prepubertal gynecomastia linked to lavender and tea tree oils. N Engl J Med 356 (5): 479-85, 2007.17267908

## Summary of the Evidence for Aromatherapy With Essential Oils

To assist readers in evaluating the results of human studies of integrative, alternative, and complementary therapies for people with cancer, the strength of the evidence (i.e., the levels of evidence) associated with each type of treatment is provided whenever possible. To qualify for a level of evidence analysis, a study must:

- Be published in a peer-reviewed scientific journal.
- Report on a therapeutic outcome or outcomes, such as tumor response, improvement in survival, or measured improvement in quality of life.
- Describe clinical findings in enough detail that a meaningful evaluation can be made.

Separate levels of evidence scores are assigned to qualifying human studies on the basis of statistical strength of the study design and scientific strength of the treatment outcomes (i.e., endpoints) measured. The resulting two scores are then combined to produce an overall score, with a score of 1 being the strongest evidence and a score of 4 being the weakest design (or sometime similar). For an explanation of the scores and additional information about levels of evidence analysis for people with cancer, see Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

## Latest Updates to This Summary (10/31/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the use of aromatherapy with essential oils in the treatment of people with cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Integrative, Alternative, and Complementary Therapies Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Integrative, Alternative, and Complementary Therapies Editorial Board. PDQ Aromatherapy With Essential Oils. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/cam/hp/aromatherapy-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389313]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).